# Bile Duct Cancer (Cholangiocarcinoma) Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of bile duct cancers. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Bile Duct Cancer

Cancer of the bile duct (also called cholangiocarcinoma) is extremely rare. The true incidence of bile duct cancer is unknown because establishing an accurate diagnosis is difficult.

Traditionally, bile duct tumors located within the liver were classified with hepatocellular carcinoma as primary liver tumors.[1] In contrast, bile duct tumors located outside of the liver were classified with gallbladder cancer as extrahepatic biliary tract tumors.[1] The classification of bile duct tumors has changed to include intrahepatic tumors of the bile ducts and extrahepatic tumors (perihilar and distal) of the bile ducts.

Approximately 50% of cholangiocarcinomas arise in the bile ducts of the perihilar region, 40% in the distal region, and 10% in the intrahepatic region.

Many bile duct cancers are multifocal. In most patients, the tumor cannot be completely removed by surgery and is incurable. Palliative measures such as resection, radiation therapy (e.g., brachytherapy or external-beam radiation therapy), or stenting procedures may maintain adequate biliary drainage and allow for improved quality of life.

### Anatomy

The biliary system consists of a network of ducts that carry bile from the liver to the small bowel and is classified by its anatomical location (Figure 1). Bile is produced by the liver and is important for fat digestion.

#### Intrahepatic bile duct

The bile ducts located within the liver are called intrahepatic bile ducts. Tumors of the intrahepatic bile ducts originate in small intrahepatic ductules or large intrahepatic ducts that are proximal to the bifurcation of the right and left hepatic ducts. These tumors are also known as intrahepatic cholangiocarcinomas.

Figure 1. Anatomy of the intrahepatic bile duct.

Anatomy of the intrahepatic bile ducts; drawing shows the liver and the intrahepatic bile ducts, which include the right and left hepatic ducts. Also shown is the common hepatic duct, gallbladder, cystic duct, common bile duct, pancreas, ampulla of Vater, and small intestine. An inset shows a cross section of a liver lobule with a network of bile ductules leading into a bile duct.

#### Extrahepatic bile duct

The bile ducts located outside of the liver are called extrahepatic bile ducts. They include part of the right and left hepatic ducts that are outside of the liver, the common hepatic duct, and the common bile duct. The extrahepatic bile ducts can be further divided into the perihilar (hilum) region and distal region.

Figure 2. Anatomy of the extrahepatic bile duct.

Anatomy of the extrahepatic bile ducts; drawing shows the extrahepatic bile ducts, including the common hepatic duct (perihilar region) and the common bile duct (distal region). Also shown are the liver, right and left hepatic ducts, gallbladder, cystic duct, pancreas, ampulla of Vater, and small intestine.

- Perihilar (hilum) region. The hilum is the region where the right and left hepatic ducts exit the liver and join to form the common hepatic duct that is proximal to the origin of the cystic duct. Tumors of this region are also known as perihilar cholangiocarcinomas or Klatskin tumors.
- Distal region. This region includes the common bile duct and inserts into the small intestine. Tumors of this region are also known as extrahepatic cholangiocarcinomas (Figure 2).

### Risk Factors

Bile duct cancer may occur more frequently in patients with a history of primary sclerosing cholangitis, chronic ulcerative colitis, choledochal cysts, or infections with the liver fluke Clonorchis sinensis.[2]

### Clinical Features

Distal and perihilar bile duct cancers frequently cause biliary tract obstruction, leading to the following symptoms:

- Jaundice.
- Weight loss.
- Abdominal pain.
- Fever.
- Pruritus.

Intrahepatic bile duct cancer may be relatively indolent and difficult to differentiate clinically from metastatic adenocarcinoma deposits in the liver.

### Diagnostic and Staging Evaluation

Clinical evaluation is dependent on laboratory and radiographic imaging tests that include:

- Liver function tests and other laboratory studies.
- Abdominal ultrasonography.
- Computed tomography.
- Magnetic resonance imaging.
- Magnetic resonance cholangiopancreatography.

These tests demonstrate the extent of the primary tumor and help determine the presence or absence of distant metastases.

If a patient is medically fit for surgery and the tumor is amenable to surgical resection, surgical exploration is performed. Pathological examination of the resected specimen is done to establish definitive pathological staging.

### Prognosis

Prognosis depends in part on the tumor’s anatomical location, which affects resectability. Because of proximity to major blood vessels and diffuse extension within the liver, a bile duct tumor can be difficult to resect. Total resection is possible in 25% to 30% of lesions that originate in the distal bile duct; the resectability rate is lower for lesions that occur in more proximal sites.[3]

Complete resection with negative surgical margins offers the only chance of cure for bile duct cancer. For localized, resectable extrahepatic and intrahepatic tumors, the presence of involved lymph nodes and perineural invasion are significant adverse prognostic factors.[4-6]

Additionally, among patients with intrahepatic cholangiocarcinomas, the following prognostic factors have been associated with worse outcomes:[7-9]

- A personal history of primary sclerosing cholangitis.
- Elevated cancer antigen 19-9 level.
- Periductal infiltrating tumor growth pattern.
- Presence of hepatic venous invasion.

### References

Siegel R, Ma J, Zou Z, et al.: Cancer statistics, 2014. CA Cancer J Clin 64 (1): 9-29, 2014 Jan-Feb.24399786
de Groen PC, Gores GJ, LaRusso NF, et al.: Biliary tract cancers. N Engl J Med 341 (18): 1368-78, 1999.10536130 99450917
Stain SC, Baer HU, Dennison AR, et al.: Current management of hilar cholangiocarcinoma. Surg Gynecol Obstet 175 (6): 579-88, 1992.1280374 93079634
Wakai T, Shirai Y, Moroda T, et al.: Impact of ductal resection margin status on long-term survival in patients undergoing resection for extrahepatic cholangiocarcinoma. Cancer 103 (6): 1210-6, 2005.15685618
Klempnauer J, Ridder GJ, von Wasielewski R, et al.: Resectional surgery of hilar cholangiocarcinoma: a multivariate analysis of prognostic factors. J Clin Oncol 15 (3): 947-54, 1997.9060532
Bhuiya MR, Nimura Y, Kamiya J, et al.: Clinicopathologic studies on perineural invasion of bile duct carcinoma. Ann Surg 215 (4): 344-9, 1992.1558415 92214987
Rosen CB, Nagorney DM, Wiesner RH, et al.: Cholangiocarcinoma complicating primary sclerosing cholangitis. Ann Surg 213 (1): 21-5, 1991.1845927
Shirabe K, Mano Y, Taketomi A, et al.: Clinicopathological prognostic factors after hepatectomy for patients with mass-forming type intrahepatic cholangiocarcinoma: relevance of the lymphatic invasion index. Ann Surg Oncol 17 (7): 1816-22, 2010.20135355
Isa T, Kusano T, Shimoji H, et al.: Predictive factors for long-term survival in patients with intrahepatic cholangiocarcinoma. Am J Surg 181 (6): 507-11, 2001.11513774

## Cellular Classification of Bile Duct Cancer

### Intrahepatic Bile Duct Cancer

The most common histopathological types of intrahepatic bile duct tumor include:[1]

- Intrahepatic cholangiocarcinoma.
- Biliary intraepithelial neoplasia, grade 3 (high-grade dysplasia).
- Combined hepatocellular-cholangiocarcinoma.
- Carcinosarcoma.
- Intraductal papillary neoplasm with an associated invasive carcinoma.
- Mucinous cystic neoplasm with an associated invasive carcinoma.
- Neuroendocrine carcinoma.
- Large cell neuroendocrine carcinoma.
- Small cell neuroendocrine carcinoma.
- Intraductal papillary neoplasm with high-grade dysplasia.

### Perihilar Bile Duct Cancer

Adenocarcinomas are the most common type of perihilar bile duct tumor. The histological types of perihilar bile duct cancer include:[2]

- Carcinoma in situ.
- Biliary intraepithelial neoplasia, high grade.
- Intraductal papillary neoplasm with high-grade dysplasia.
- Mucinous cystic neoplasm with high-grade intraepithelial neoplasia.
- Adenocarcinoma.
- Adenocarcinoma, biliary type.
- Adenocarcinoma, gastric foveolar type.
- Adenocarcinoma, intestinal type.
- Clear cell adenocarcinoma.
- Mucinous carcinoma.
- Signet-ring cell carcinoma.
- Squamous cell carcinoma.
- Adenosquamous carcinoma.
- Undifferentiated carcinoma.
- High-grade neuroendocrine carcinoma.
- Small cell neuroendocrine carcinoma.
- Intraductal papillary neoplasm with an associated invasive carcinoma.
- Mucinous cystic neoplasm with an associated invasive carcinoma.

### Distal Bile Duct Cancer

Adenocarcinomas are the most common type of distal bile duct tumor. The histological types of distal bile duct cancer include:[3]

- Carcinoma in situ.
- Biliary intraepithelial neoplasia, high grade.
- Intraductal papillary neoplasm with high-grade intraepithelial neoplasia.
- Mucinous cystic neoplasm with high-grade intraepithelial neoplasia.
- Adenocarcinoma.
- Adenocarcinoma, biliary type.
- Adenocarcinoma, intestinal type.
- Adenocarcinoma, gastric foveolar type.
- Mucinous adenocarcinoma.
- Clear cell adenocarcinoma.
- Signet-ring cell carcinoma.
- Squamous cell carcinoma.
- Adenosquamous carcinoma.
- Undifferentiated carcinoma.
- High-grade neuroendocrine carcinoma.
- Small cell neuroendocrine carcinoma.
- Mixed adenoneuroendocrine carcinoma.
- Intraductal papillary neoplasm with an associated invasive carcinoma.
- Mucinous cystic neoplasm with an associated invasive carcinoma.

### References

Intrahepatic Bile Ducts. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp. 295–302.
Perihilar bile ducts. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp. 311–16.
Distal bile duct. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp. 317–25.

## Stage Information for Bile Duct Cancer

### Staging for Bile Duct Cancer

Bile duct cancer is classified as resectable (localized) or unresectable, with obvious prognostic importance. The TNM (tumor, node, metastasis) staging system is used for staging bile duct cancer, commonly after surgery and pathological examination of the resected specimen. Evaluation of the extent of disease at laparotomy is an important component of staging.

### AJCC Staging System for Bile Duct Cancer

#### AJCC staging system for intrahepatic bile duct cancer

The AJCC has designated staging by TNM classification to define intrahepatic bile duct cancer.[1]

Tables 1, 2, 3, 4, and 5 pertain to the intrahepatic bile duct cancer stages.

Table 1. Definitions of TNM Stage 0 Intrahepatic Bile Duct Cancer^a^

Stage | TNM | Description
0 | Tis, N0, M0 | Tis = Carcinoma in situ (intraductal tumor).
0 | Tis, N0, M0 | N0 = No regional lymph node metastasis.
0 | Tis, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Intrahepatic Bile Duct. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 295–302.

Table 2. Definitions of TNM Stage I Intrahepatic Bile Duct Cancer^a^

Stage | | TNM | Description
I | IA | T1a, N0, M0 | T1a = Solitary tumor ≤5 cm without vascular invasion.
I | IA | T1a, N0, M0 | N0 = No regional lymph node metastasis.
I | IA | T1a, N0, M0 | M0 = No distant metastasis.
I | IB | T1b, N0, M0 | T1b = Solitary tumor >5 cm without vascular invasion.
I | IB | T1b, N0, M0 | N0 = No regional lymph node metastasis.
I | IB | T1b, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Intrahepatic Bile Duct. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 295–302.

Table 3. Definitions of TNM Stage II Intrahepatic Bile Duct Cancer^a^

Stage | TNM | Description
II | T2, N0, M0 | T2 = Solitary tumor with intrahepatic vascular invasion or multiple tumors, with or without vascular invasion.
II | T2, N0, M0 | N0 = No regional lymph node metastasis.
II | T2, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Intrahepatic Bile Duct. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 295–302.

Table 4. Definitions of TNM Stage III Intrahepatic Bile Duct Cancer^a^

Stage | | TNM | Description
III | IIIA | T3, N0, M0 | T3 =Tumor perforating the visceral peritoneum.
III | IIIA | T3, N0, M0 | N0 = No regional lymph node metastasis.
III | IIIA | T3, N0, M0 | M0 = No distant metastasis.
III | IIIB | T4, N0, M0 | T4 = Tumor involving local extrahepatic structures by direct invasion.
III | IIIB | T4, N0, M0 | N0 = No regional lymph node metastasis.
III | IIIB | T4, N0, M0 | M0 = No distant metastasis.
III | IIIB | Any T, N1, M0 | TX = Primary tumor cannot be assessed.
III | IIIB | Any T, N1, M0 | T0 = No evidence of primary tumor.
III | IIIB | Any T, N1, M0 | Tis = Carcinoma in situ (intraductal tumor).
III | IIIB | Any T, N1, M0 | T1 = Solitary tumor without vascular invasion, ≤5 cm or >5 cm.
III | IIIB | Any T, N1, M0 | –T1a = Solitary tumor ≤5 cm without vascular invasion.
III | IIIB | Any T, N1, M0 | –T1b = Solitary tumor >5 cm without vascular invasion.
III | IIIB | Any T, N1, M0 | T2 = Solitary tumor with intrahepatic vascular invasion or multiple tumors, with or without vascular invasion.
III | IIIB | Any T, N1, M0 | T3 = Tumor perforating the visceral peritoneum.
III | IIIB | Any T, N1, M0 | T4 = Tumor involving local extrahepatic structures by direct invasion.
III | IIIB | Any T, N1, M0 | N1 = Regional lymph node metastasis present.
III | IIIB | Any T, N1, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Intrahepatic Bile Duct. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 295–302.

Table 5. Definitions of TNM Stage IV Intrahepatic Bile Duct Cancer^a^

Stage | TNM | Description
IV | Any T, Any N, M1 | TX = Primary tumor cannot be assessed.
IV | Any T, Any N, M1 | T0 = No evidence of primary tumor.
IV | Any T, Any N, M1 | Tis = Carcinoma in situ (intraductal tumor).
IV | Any T, Any N, M1 | T1 = Solitary tumor without vascular invasion, ≤5 cm or >5 cm.
IV | Any T, Any N, M1 | –T1a = Solitary tumor ≤5 cm without vascular invasion.
IV | Any T, Any N, M1 | –T1b = Solitary tumor >5 cm without vascular invasion.
IV | Any T, Any N, M1 | T2 = Solitary tumor with intrahepatic vascular invasion or multiple tumors, with or without vascular invasion.
IV | Any T, Any N, M1 | T3 = Tumor perforating the visceral peritoneum.
IV | Any T, Any N, M1 | T4 = Tumor involving local extrahepatic structures by direct invasion.
IV | Any T, Any N, M1 | NX = Regional lymph nodes cannot be assessed.
IV | Any T, Any N, M1 | N0 = No regional lymph node metastasis.
IV | Any T, Any N, M1 | N1 = Regional lymph node metastasis present.
IV | Any T, Any N, M1 | M1 = Distant metastasis present.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Intrahepatic Bile Duct. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 295–302.

#### AJCC staging system for perihilar bile duct cancer

The AJCC has designated staging by TNM classification to define perihilar bile duct cancer.[2]

Tables 6, 7, 8, 9, and 10 pertain to the perihilar bile duct cancer stages.

Table 6. Definitions of TNM Stage 0 Perihilar Bile Duct Cancer^a^

Stage | TNM | Description
0 | Tis, N0, M0 | Tis = Carcinoma in situ/high-grade dysplasia.
0 | Tis, N0, M0 | N0 = No regional lymph node metastasis.
0 | Tis, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Perihilar Bile Ducts. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 311–6.

Table 7. Definitions of TNM Stage I Perihilar Bile Duct Cancer^a^

Stage | TNM | Description
I | T1, N0, M0 | T1 = Tumor confined to the bile duct, with extension up to the muscle layer or fibrous tissue.
I | T1, N0, M0 | N0 = No regional lymph node metastasis.
I | T1, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Perihilar Bile Ducts. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 311–6.

Table 8. Definitions of TNM Stage II Perihilar Bile Duct Cancer^a^

Stage | TNM | Description
II | T2a–b, N0, M0 | T2 = Tumor invades beyond the wall of the bile duct to surrounding adipose tissue, or tumor invades adjacent hepatic parenchyma.
II | T2a–b, N0, M0 | –T2a = Tumor invades beyond the wall of the bile duct to surrounding adipose tissue.
II | T2a–b, N0, M0 | –T2b = Tumor invades adjacent hepatic parenchyma.
II | T2a–b, N0, M0 | N0 = No regional lymph node metastasis.
II | T2a–b, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Perihilar Bile Ducts. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 311–6.

Table 9. Definitions of TNM Stage III Perihilar Bile Duct Cancer^a^

Stage | | TNM | Description
III | IIIA | T3, N0, M0 | T3 = Tumor invades unilateral branches of the portal vein or hepatic artery.
III | IIIA | T3, N0, M0 | N0 = No regional lymph node metastasis.
III | IIIA | T3, N0, M0 | M0 = No distant metastasis.
III | IIIB | T4, N0, M0 | T4 = Tumor invades the main portal vein or its branches bilaterally, or the common hepatic artery; or unilateral second-order biliary radicals with contralateral portal vein or hepatic artery involvement.
III | IIIB | T4, N0, M0 | N0 = No regional lymph node metastasis.
III | IIIB | T4, N0, M0 | M0 = No distant metastasis.
III | IIIC | Any T, N1, M0 | TX = Primary tumor cannot be assessed.
III | IIIC | Any T, N1, M0 | T0 = No evidence of primary tumor.
III | IIIC | Any T, N1, M0 | Tis = Carcinoma in situ/high-grade dysplasia.
III | IIIC | Any T, N1, M0 | T1 = Tumor confined to the bile duct, with extension up to the muscle layer or fibrous tissue.
III | IIIC | Any T, N1, M0 | T2 = Tumor invades beyond the wall of the bile duct to surrounding adipose tissue, or tumor invades adjacent hepatic parenchyma.
III | IIIC | Any T, N1, M0 | –T2a = Tumor invades beyond the wall of the bile duct to surrounding adipose tissue.
III | IIIC | Any T, N1, M0 | –T2b = Tumor invades adjacent hepatic parenchyma.
III | IIIC | Any T, N1, M0 | T3 = Tumor invades unilateral branches of the portal vein or hepatic artery.
III | IIIC | Any T, N1, M0 | T4 = Tumor invades the main portal vein or its branches bilaterally, or the common hepatic artery; or unilateral second-order biliary radicals with contralateral portal vein or hepatic artery involvement.
III | IIIC | Any T, N1, M0 | N1 = One to three positive lymph nodes typically involving the hilar, cystic duct, common bile duct, hepatic artery, posterior pancreatoduodenal, and portal vein lymph nodes.
III | IIIC | Any T, N1, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Perihilar Bile Ducts. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 311–6.

Table 10. Definitions of TNM Stage IV Perihilar Bile Duct Cancer^a^

Stage | | TNM | Description
IV | IVA | Any T, N2, M0 | TX = Primary tumor cannot be assessed.
IV | IVA | Any T, N2, M0 | T0 = No evidence of primary tumor.
IV | IVA | Any T, N2, M0 | Tis = Carcinoma in situ/high-grade dysplasia.
IV | IVA | Any T, N2, M0 | T1 = Tumor confined to the bile duct, with extension up to the muscle layer or fibrous tissue.
IV | IVA | Any T, N2, M0 | T2 = Tumor invades beyond the wall of the bile duct to surrounding adipose tissue, or tumor invades adjacent hepatic parenchyma.
IV | IVA | Any T, N2, M0 | –T2a = Tumor invades beyond the wall of the bile duct to surround adipose tissue.
IV | IVA | Any T, N2, M0 | –T2b = Tumor invades adjacent hepatic parenchyma.
IV | IVA | Any T, N2, M0 | T3 = Tumor invades unilateral branches of the portal vein or hepatic artery.
IV | IVA | Any T, N2, M0 | T4 = Tumor invades the main portal vein or its branches bilaterally, or the common hepatic artery; or unilateral second-order biliary radicals with contralateral portal vein or hepatic artery involvement.
IV | IVA | Any T, N2, M0 | N2 = Four or more positive lymph nodes from the sites described for N1.
IV | IVA | Any T, N2, M0 | M0 = No distant metastasis.
IV | IVB | Any T, Any N, M1 | TX = Primary tumor cannot be assessed.
IV | IVB | Any T, Any N, M1 | T0 = No evidence of primary tumor.
IV | IVB | Any T, Any N, M1 | Tis = Carcinoma in situ/high-grade dysplasia.
IV | IVB | Any T, Any N, M1 | T1 = Tumor confined to the bile duct, with extension up to the muscle layer or fibrous tissue.
IV | IVB | Any T, Any N, M1 | T2 = Tumor invades beyond the wall of the bile duct to surrounding adipose tissue, or tumor invades adjacent hepatic parenchyma.
IV | IVB | Any T, Any N, M1 | –T2a = Tumor invades beyond the wall of the bile duct to surround adipose tissue.
IV | IVB | Any T, Any N, M1 | –T2b = Tumor invades adjacent hepatic parenchyma.
IV | IVB | Any T, Any N, M1 | T3 = Tumor invades unilateral branches of the portal vein or hepatic artery.
IV | IVB | Any T, Any N, M1 | T4 = Tumor invades the main portal vein or its branches bilaterally, or the common hepatic artery; or unilateral second-order biliary radicals with contralateral portal vein or hepatic artery involvement.
IV | IVB | Any T, Any N, M1 | NX = Regional lymph nodes cannot be assessed.
IV | IVB | Any T, Any N, M1 | N0 = No regional lymph node metastasis.
IV | IVB | Any T, Any N, M1 | N1 = One to three positive lymph nodes typically involving the hilar, cystic duct, common bile duct, hepatic artery, posterior pancreatoduodenal, and portal vein lymph nodes.
IV | IVB | Any T, Any N, M1 | N2 = Four or more positive lymph nodes from the sites described for N1.
IV | IVB | Any T, Any N, M1 | M1 = Distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Perihilar Bile Ducts. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 311–6.

#### AJCC staging system for distal bile duct cancer

The AJCC has designated staging by TNM classification to define distal bile duct cancer.[3] Stages defined by TNM classification apply to all primary carcinomas arising in the distal bile duct or in the cystic duct; these stages do not apply to perihilar or intrahepatic cholangiocarcinomas, sarcomas, or carcinoid tumors.

Tables 11, 12, 13, 14, and 15 pertain to the distal bile duct cancer stages.

Table 11. Definitions of TNM Stage 0 Distal Bile Duct Cancer^a^

Stage | TNM | Definition
0 | Tis, N0, M0 | Tis = Carcinoma in situ/high-grade dysplasia.
0 | Tis, N0, M0 | N0 = No regional lymph node metastasis.
0 | Tis, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Distal Bile Duct. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 317–325.

Table 12. Definitions of TNM Stage I Distal Bile Duct Cancer^a^

Stage | TNM | Definition
I | T1, N0, M0 | T1 = Tumor invades the bile duct wall with a depth <5 mm.
I | T1, N0, M0 | N0 = No regional lymph node metastasis.
I | T1, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Distal Bile Duct. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 317–325.

Table 13. Definitions of TNM II Distal Bile Duct Cancer^a^

Stage | | TNM | Definition
II | IIA | T1, N1, M0 | T1 = Tumor invades the bile duct wall with a depth <5 mm.
II | IIA | T1, N1, M0 | N1 = Metastasis in one to three regional lymph nodes.
II | IIA | T1, N1, M0 | M0 = No distant metastasis.
II | IIA | T2, N0, M0 | Tumor invades the bile duct wall with a depth of 5–12 mm.
II | IIA | T2, N0, M0 | N0 = No regional lymph node metastasis.
II | IIA | T2, N0, M0 | M0 = No distant metastasis.
II | IIB | T2, N1, M0 | T2 = Tumor invades the bile duct wall with a depth of 5–12 mm.
II | IIB | T2, N1, M0 | N1 = Metastasis in one to three regional lymph nodes.
II | IIB | T2, N1, M0 | M0 = No distant metastasis.
II | IIB | T3, N0, M0 | T3 = Tumor invades the bile duct wall with a depth >12 mm.
II | IIB | T3, N0, M0 | N0 = No regional lymph node metastasis.
II | IIB | T3, N0, M0 | M0 = No distant metastasis.
II | IIB | T3, N1, M0 | T3 = Tumor invades the bile duct wall with a depth >12 mm.
II | IIB | T3, N1, M0 | N1 = Metastasis in one to three regional lymph nodes.
II | IIB | T3, N1, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Distal Bile Duct. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 317–325.

Table 14. Definitions of TNM Stage III Distal Bile Duct Cancer

Stage | | TNM | Definition
III | IIIA | T1, N2, M0 | T1 = Tumor invades the bile duct wall with a depth <5 mm.
III | IIIA | T1, N2, M0 | N2 = Metastasis in four or more regional lymph nodes.
III | IIIA | T1, N2, M0 | M0 = No distant metastasis.
III | IIIA | T2, N2, M0 | T2 = Tumor invades the bile duct wall with a depth of 5–12 mm.
III | IIIA | T2, N2, M0 | N2 = Metastasis in four or more regional lymph nodes.
III | IIIA | T2, N2, M0 | M0 = No distant metastasis.
III | IIIA | T3, N2, M0 | T3 = Tumor invades the bile duct wall with a depth >12 mm.
III | IIIA | T3, N2, M0 | N2 = Metastasis in four or more regional lymph nodes.
III | IIIA | T3, N2, M0 | M0 = No distant metastasis.
III | IIIB | T4, N0, M0 | T4 = Tumor involves the celiac axis, superior mesenteric artery, and/or common hepatic artery.
III | IIIB | T4, N0, M0 | N0 = No regional lymph node metastasis.
III | IIIB | T4, N0, M0 | M0 = No distant metastasis.
III | IIIB | T4, N1, M0 | T4 = Tumor involves the celiac axis, superior mesenteric artery, and/or common hepatic artery.
III | IIIB | T4, N1, M0 | N1 = Metastasis in one to three regional lymph nodes.
III | IIIB | T4, N1, M0 | M0 = No distant metastasis.
III | IIIB | T4, N2, M0 | T4 = Tumor involves the celiac axis, superior mesenteric artery, and/or common hepatic artery.
III | IIIB | T4, N2, M0 | N2 = Metastasis in four or more regional lymph nodes.
III | IIIB | T4, N2, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Distal Bile Duct. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 317–325.

Table 15. Definitions of TNM Stage IV Distal Bile Duct Cancer^a^

Stage | TNM | Definition
IV | Any T, Any N, M1 | TX = Primary tumor cannot be assessed.
IV | Any T, Any N, M1 | TIS = Carcinoma in situ/high-grade dysplasia.
IV | Any T, Any N, M1 | T1 = Tumor invades the bile duct wall with a depth <5 mm.
IV | Any T, Any N, M1 | T2 = Tumor invades the bile duct wall with a depth of 5–12 mm.
IV | Any T, Any N, M1 | T3 = Tumor invades the bile duct wall with a depth >12 mm.
IV | Any T, Any N, M1 | T4 = Tumor involves the celiac axis, superior mesenteric artery, and/or common hepatic artery.
IV | Any T, Any N, M1 | NX = Regional lymph nodes cannot be assessed.
IV | Any T, Any N, M1 | N0 = No regional lymph node metastasis.
IV | Any T, Any N, M1 | N1 = Metastasis in one to three regional lymph nodes.
IV | Any T, Any N, M1 | N2 = Metastasis in four or more regional lymph nodes.
IV | Any T, Any N, M1 | M1 = Distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Distal Bile Duct. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 317–325.

### References

Intrahepatic Bile Ducts. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp. 295–302.
Perihilar Bile Ducts. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp. 311–6.
Distal bile duct. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp. 317–25.

## Treatment Option Overview for Bile Duct Cancer

The treatment of bile duct cancer depends primarily on whether the cancer can be completely removed by surgery.

### Resectable (Localized) Bile Duct Cancer

Localized intrahepatic and extrahepatic bile duct cancer may be completely removed by surgery. These tumors represent a very small number of cases and are usually in the distal common bile duct. Among patients treated with surgical resection, long-term prognosis varies depending on primary tumor extent, margin status, lymph node involvement, and additional pathological features.[1,2]

Extended resections of hepatic duct bifurcation tumors (Klatskin tumors, also known as hilar tumors) to include adjacent liver, either by lobectomy or removal of portions of segments 4 and 5 of the liver, may be performed. If major hepatic resection is necessary to achieve a complete resection, postoperative hepatic reserve should be evaluated. For patients with underlying cirrhosis, the Child-Pugh class and the Model for End-Stage Liver Disease score are determined.

### Unresectable (Including Metastatic and Recurrent) Bile Duct Cancer

Most cases of intrahepatic, distal, and perihilar bile duct cancer are unresectable and cannot be completely removed. Often the cancer directly invades the portal vein, the adjacent liver, along the common bile duct, and the adjacent lymph nodes. Portal hypertension may result from invasion of the portal vein. Spread to distant parts of the body is uncommon, but intra-abdominal metastases, particularly peritoneal metastases, do occur. Transperitoneal and hematogenous hepatic metastases also occur with bile duct cancer of all sites. Moreover, most patients who undergo resection will develop recurrent disease within the hepatobiliary system or, less frequently, at distant sites.

In locally advanced disease, phase II trials have evaluated chemoradiotherapy with the goal of improved local control and potential downstaging for surgical resection.[3,4] These approaches have not been compared with standard therapy, and the curative potential is unknown.

For patients with unresectable bile duct cancer, management is directed at palliation.

Treatment options for bile duct cancer are described in Table 16.

Table 16. Treatment Options for Bile Duct Cancer

Staging Criteria | Treatment Options
Resectable (Localized) Bile Duct Cancer | Surgery
Resectable (Localized) Bile Duct Cancer | Adjuvant therapy
Unresectable (Including Metastatic and Recurrent) Bile Duct Cancer | Palliative therapy
Unresectable (Including Metastatic and Recurrent) Bile Duct Cancer | Chemotherapy
Unresectable (Including Metastatic and Recurrent) Bile Duct Cancer | Immunotherapy
Unresectable (Including Metastatic and Recurrent) Bile Duct Cancer | Targeted therapy

### Capecitabine and Fluorouracil Dosing

The DPYD gene encodes an enzyme that catabolizes pyrimidines and fluoropyrimidines, like capecitabine and fluorouracil. An estimated 1% to 2% of the population has germline pathogenic variants in DPYD, which lead to reduced DPD protein function and an accumulation of pyrimidines and fluoropyrimidines in the body.[5,6] Patients with the DPYD*2A variant who receive fluoropyrimidines may experience severe, life-threatening toxicities that are sometimes fatal. Many other DPYD variants have been identified, with a range of clinical effects.[5-7] Fluoropyrimidine avoidance or a dose reduction of 50% may be recommended based on the patient's DPYD genotype and number of functioning DPYD alleles.[8-10] DPYD genetic testing costs less than $200, but insurance coverage varies due to a lack of national guidelines.[11] In addition, testing may delay therapy by 2 weeks, which would not be advisable in urgent situations. This controversial issue requires further evaluation.[12]

### References

Nagorney DM, Donohue JH, Farnell MB, et al.: Outcomes after curative resections of cholangiocarcinoma. Arch Surg 128 (8): 871-7; discussion 877-9, 1993.8393652
Washburn WK, Lewis WD, Jenkins RL: Aggressive surgical resection for cholangiocarcinoma. Arch Surg 130 (3): 270-6, 1995.7534059
Edeline J, Touchefeu Y, Guiu B, et al.: Radioembolization Plus Chemotherapy for First-line Treatment of Locally Advanced Intrahepatic Cholangiocarcinoma: A Phase 2 Clinical Trial. JAMA Oncol 6 (1): 51-59, 2020.31670746
Cercek A, Boerner T, Tan BR, et al.: Assessment of Hepatic Arterial Infusion of Floxuridine in Combination With Systemic Gemcitabine and Oxaliplatin in Patients With Unresectable Intrahepatic Cholangiocarcinoma: A Phase 2 Clinical Trial. JAMA Oncol 6 (1): 60-67, 2020.31670750
Sharma BB, Rai K, Blunt H, et al.: Pathogenic DPYD Variants and Treatment-Related Mortality in Patients Receiving Fluoropyrimidine Chemotherapy: A Systematic Review and Meta-Analysis. Oncologist 26 (12): 1008-1016, 2021.34506675
Lam SW, Guchelaar HJ, Boven E: The role of pharmacogenetics in capecitabine efficacy and toxicity. Cancer Treat Rev 50: 9-22, 2016.27569869
Shakeel F, Fang F, Kwon JW, et al.: Patients carrying DPYD variant alleles have increased risk of severe toxicity and related treatment modifications during fluoropyrimidine chemotherapy. Pharmacogenomics 22 (3): 145-155, 2021.33410339
Amstutz U, Henricks LM, Offer SM, et al.: Clinical Pharmacogenetics Implementation Consortium (CPIC) Guideline for Dihydropyrimidine Dehydrogenase Genotype and Fluoropyrimidine Dosing: 2017 Update. Clin Pharmacol Ther 103 (2): 210-216, 2018.29152729
Henricks LM, Lunenburg CATC, de Man FM, et al.: DPYD genotype-guided dose individualisation of fluoropyrimidine therapy in patients with cancer: a prospective safety analysis. Lancet Oncol 19 (11): 1459-1467, 2018.30348537
Lau-Min KS, Varughese LA, Nelson MN, et al.: Preemptive pharmacogenetic testing to guide chemotherapy dosing in patients with gastrointestinal malignancies: a qualitative study of barriers to implementation. BMC Cancer 22 (1): 47, 2022.34996412
Brooks GA, Tapp S, Daly AT, et al.: Cost-effectiveness of DPYD Genotyping Prior to Fluoropyrimidine-based Adjuvant Chemotherapy for Colon Cancer. Clin Colorectal Cancer 21 (3): e189-e195, 2022.35668003
Baker SD, Bates SE, Brooks GA, et al.: DPYD Testing: Time to Put Patient Safety First. J Clin Oncol 41 (15): 2701-2705, 2023.36821823

## Treatment of Resectable (Localized) Bile Duct Cancer

### Treatment Options for Resectable (Localized) Bile Duct Cancer

Treatment options for resectable (localized) bile duct cancer include:

1. Surgery.
2. Adjuvant therapy.

#### Surgery

##### Intrahepatic bile duct cancer

For intrahepatic bile duct cancers, hepatic resection to achieve negative margins is potentially curative. If a major liver resection is necessary to achieve negative surgical margins, preoperative portal vein embolization may be considered to optimize the volume of the remnant liver.

Partial liver resection or partial hepatectomy to achieve negative margins is a procedure with curative intent for patients with intrahepatic cholangiocarcinoma.[1] The extent of liver resection necessary depends on the extent of hepatic parenchymal involvement and the proximity of the tumor to major blood vessels in this region.

The role of routine portal lymphadenectomy has not been well established because of the risk of common bile duct devascularization.

##### Perihilar bile duct cancer

For perihilar cholangiocarcinomas (Klatskin tumors), bile duct resection alone leads to high local recurrence rates resulting from the early confluence of the hepatic ducts and the caudate lobe. The addition of partial hepatectomy that includes the caudate lobe has improved long-term outcomes, but it may be associated with increased postoperative complications.[2] With this aggressive surgical approach, 5-year survival rates of 20% to 50% have been reported.[3] An understanding of both the normal and varied vascular and ductal anatomy of the porta hepatis has increased the number of hepatic duct bifurcation tumors that can be resected.

The primary site of relapse after surgical resection is local, but distant recurrence is also frequently reported.[4]

The optimal surgical procedure for carcinoma of the perihilar bile duct varies according to the location of the tumor along the biliary tree, the extent of hepatic parenchymal involvement, and the proximity of the tumor to major blood vessels in this region. The state of the regional lymph nodes is assessed at the time of surgery because of their prognostic significance. Operations for bile duct cancer are usually extensive. A historical cohort reported an operative mortality rate of approximately 10%, along with a roughly 40% risk of disease recurrence.[5]

In jaundiced patients, the role of percutaneous transhepatic catheter drainage or endoscopic placement of a stent for relief of biliary obstruction is controversial because of inconsistent findings of significant clinical benefit and concerns of increased risk of postoperative complications.[6] However, percutaneous transhepatic catheter drainage or endoscopic placement of a stent for relief of biliary obstruction may be considered before surgery, particularly if jaundice is severe or an element of azotemia is present.[7,8]

##### Distal bile duct cancer

Complete surgical resection with negative surgical margins offers the only chance of cure for distal bile duct cancers. Bile duct tumors can be difficult to resect because of their proximity to major blood vessels and diffuse infiltration of adjacent bile ducts. Total resection is possible in 25% to 30% of lesions that originate in the distal bile duct. The resectability rate is lower for lesions that occur in more proximal sites.[9]

The optimum surgical procedure for carcinoma of the distal bile duct will vary according to the location of the tumor along the biliary tree, the extent of hepatic parenchymal involvement, and the proximity of the tumor to major blood vessels in this region. The regional lymph nodes are assessed at the time of surgery because they have prognostic significance. Patients with cancer of the lower end of the duct and regional lymph node involvement may warrant an extensive resection (Whipple procedure). The 5-year survival outcomes range between 20% and 50%.[10,11] Bypass operations or endoluminal stents are alternatives if intraoperatively the tumor is found to be unresectable.[10,11]

In jaundiced patients, the role of percutaneous transhepatic catheter drainage or endoscopic placement of a stent for relief of biliary obstruction is controversial, but these options may be considered before surgery, particularly if jaundice is severe or an element of azotemia is present.[7,8]

#### Adjuvant therapy

##### Chemotherapy

Numerous retrospective series have suggested that adjuvant chemotherapy after complete surgical resection may be beneficial.[12,13][Level of evidence C2] However, prospective randomized trials have failed to consistently show a significant benefit in overall survival (OS).

Evidence (chemotherapy):

1. A multicenter phase III study in the United Kingdom (BILCAP) included 447 patients with cholangiocarcinoma or muscle-invasive gallbladder cancer who underwent a macroscopically complete resection with curative intent. Patients were randomly assigned to receive eight cycles of capecitabine (1,250 mg/m^2^ twice a day on days 1−14 of a 21-day cycle) or observation.[13][Level of evidence B1] At a median follow-up of 106 months, the following results were observed:
  - There was no statistically significant difference in OS in the intention-to-treat analysis (median OS, 49.6 months in the capecitabine group vs. 36.1 months in the observation group; adjusted hazard ratio [HR], 0.84; 95% confidence interval [CI], 0.67−1.06; P > .05).
  - In the intention-to-treat analysis, the median recurrence-free survival (RFS) was 24.3 months (95% CI, 18.6–34.6) in the capecitabine group and 17.4 months (95% CI, 11.8–23) in the observation group. An adjusted Cox proportional hazards model suggested potential improvement in RFS in the first 24 months from randomization (HR, 0.74; 95% CI, 0.57–0.96), but with no significant difference in the period after 24 months (HR, 1.57; 95% CI, 0.90–2.74).
2. The open-label, randomized, phase II STAMP (https://www.cancer.gov/clinicaltrials/NCT03079427) study (NCT03079427), presented in abstract form, included 101 patients with perihilar or distal bile duct cancer, at least one regional lymph node metastasis (N1 or greater), and complete macroscopic (R0 or R1) resection within 12 weeks. Patients were assigned to receive either eight cycles of capecitabine (1,250 mg/m^2^) twice a day on days 1–14 of a 21-day cycle (based on the BILCAP trial) or eight cycles of cisplatin (25 mg/m^2^) and gemcitabine (1,000 mg/m^2^) on days 1 and 8 of a 21-day cycle. The primary end point was disease-free survival (DFS).[14][Level of evidence B1] At a median follow-up of 28.7 months, the following results were observed:
  - The median DFS was 14.3 months (1-sided 90% CI, 10.7–16.5) in the cisplatin-and-gemcitabine group and 11.1 months in the capecitabine group (1-sided 90% CI, 8.4–12.7).
  - The median OS was 35.7 months (1-sided 90% CI, 29.5–not estimated) in the cisplatin-and-gemcitabine group and 35.7 months (1-sided 90% CI, 30.9–not estimated) in the capecitabine group.
  - The gemcitabine-and-cisplatin group had increased rates of toxicity. Grade 3 to 4 adverse events occurred in 84% of patients who received gemcitabine and cisplatin (most commonly neutropenia) and in 16% of patients who received capecitabine (most commonly hand-foot syndrome).
  - Given the lack of significant difference in DFS and OS and the higher toxicity rate in the cisplatin-and-gemcitabine group, capecitabine remains the reference standard for adjuvant therapy.
3. A French multicenter phase III study (PRODIGE 12-ACCORD 18-UNICANCER GI) randomly assigned 196 patients with R0 or R1 resection of localized biliary tract cancer to 12 cycles of adjuvant gemcitabine plus oxaliplatin (GEMOX) or surveillance. The primary end point was RFS, and the secondary end point was OS.[15][Level of evidence B1] After a median follow-up of 46.5 months the following results were observed:
  - There was no statistically significant difference in RFS (median, 30.4 months with GEMOX vs. 18.5 months with observation; HR, 0.88; 95% CI, 0.62–1.25, P = .48).
  - There was also no statistically significant difference in OS (75.8 months with GEMOX vs. 50.8 months with observation; HR, 1.08; 95% CI, 0.7–1.66; P = .74).
4. The Bile Duct Cancer Adjuvant Trial (BCAT), a Japanese, multicenter, phase III study, included 225 patients with resected bile duct cancer. Patients were randomly assigned to six cycles of adjuvant gemcitabine or observation. The primary end point was OS, and the secondary end point was RFS.[16][Level of evidence B1]
  - There was no significant difference in OS (median, 62.3 months with gemcitabine vs. 63.8 months with observation; HR, 1.01; 95% CI, 0.7–1.45; P = .964).
  - No OS differences were observed, even in subgroups stratified by lymph node status and surgical margin status.
  - There was also no significant difference in RFS (median, 36 months with gemcitabine vs. 39.9 months with observation; HR, 0.93; P = .693).
5. The European Study Group for Pancreatic Cancer (ESPAC-3 (https://www.cancer.gov/clinicaltrials/NCT00058201) trial [NCT00058201]) enrolled 428 patients with periampullary cancer, which included 96 patients with bile duct cancers. Patients were randomly assigned to observation, 6 months of fluorouracil (5-FU)/leucovorin, or 6 months of gemcitabine.[17][Level of evidence B1]
  - Among all patients, adjuvant chemotherapy was not associated with significant OS benefit when compared with observation. However, after adjusting for prognostic variables by multivariable analysis, a statistically significant OS benefit was associated with adjuvant chemotherapy (HR, 0.75; 95% CI, 0.57–0.98; P = .03).
  - In a preplanned subgroup analysis of the 96 patients with bile duct cancer, no benefit was seen among patients treated with chemotherapy. Limitations of this subgroup analysis include limited statistical power and difficulty in differentiating ampullary versus distal common bile duct tumors as the pathological site of origin.
  - The median survival was 27 months for the observation-alone group, 18 months for the 5-FU-leucovorin group, and 20 months for the gemcitabine-alone group.[17]
6. A multi-institutional Japanese study compared surgery alone with mitomycin and infusional 5-FU followed by 5-FU until disease progression.[18][Level of evidence B1]
  - Among the subset of patients with bile duct cancer (n = 139), no survival benefit was seen.

For a list of chemotherapy regimens with potential activity, see the Treatment of Unresectable (Including Metastatic and Recurrent) Bile Duct Cancer section.

##### External-beam radiation therapy (EBRT)

Numerous retrospective studies have suggested that adding EBRT after complete surgical resection may be beneficial.[19,20][Level of evidence A1] However, no prospective randomized trials have demonstrated an OS benefit.

Evidence (EBRT):

1. One small randomized trial of 207 patients with pancreatic and periampullary cancers demonstrated no survival benefit of adding chemoradiation therapy after surgery. This study had limitations: only a few patients had a diagnosis of bile duct cancer, and 20% of the patients randomly assigned to receive chemoradiation therapy did not receive treatment.[21][Level of evidence C3]
2. A phase II cooperative group trial, SWOG S0809 (https://www.cancer.gov/clinicaltrials/NCT00789958) (NCT00789958), evaluated adjuvant capecitabine and gemcitabine followed by chemoradiation therapy for resected extrahepatic cholangiocarcinoma and gallbladder cancer. In total, 79 eligible patients with pT2 to pT4 disease, node-positive disease, or positive-margin resection were enrolled (extrahepatic bile duct cancer, n = 54; gallbladder cancer, n = 25).[22][Level of evidence C2]
  - The 2-year survival rate of 65% was significantly higher than expected, based on historical controls.[22][Level of evidence C2]
  - Grade 3 toxicity was observed in 52% of patients, and grade 4 toxicity was observed in 11% of patients.
  - Based on these results, this regimen was observed to be well tolerated, but it needs to be tested in a randomized controlled trial.

All patients are encouraged to enroll in clinical trials for adjuvant therapies. Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Dodson RM, Weiss MJ, Cosgrove D, et al.: Intrahepatic cholangiocarcinoma: management options and emerging therapies. J Am Coll Surg 217 (4): 736-750.e4, 2013.23890842
Burke EC, Jarnagin WR, Hochwald SN, et al.: Hilar Cholangiocarcinoma: patterns of spread, the importance of hepatic resection for curative operation, and a presurgical clinical staging system. Ann Surg 228 (3): 385-94, 1998.9742921
Nakeeb A, Tran KQ, Black MJ, et al.: Improved survival in resected biliary malignancies. Surgery 132 (4): 555-63; discussion 563-4, 2002.12407338
Hasegawa S, Ikai I, Fujii H, et al.: Surgical resection of hilar cholangiocarcinoma: analysis of survival and postoperative complications. World J Surg 31 (6): 1256-63, 2007.17453285
Loehrer AP, House MG, Nakeeb A, et al.: Cholangiocarcinoma: are North American surgical outcomes optimal? J Am Coll Surg 216 (2): 192-200, 2013.23266423
Liu F, Li Y, Wei Y, et al.: Preoperative biliary drainage before resection for hilar cholangiocarcinoma: whether or not? A systematic review. Dig Dis Sci 56 (3): 663-72, 2011.20635143
Nimura Y: Preoperative biliary drainage before resection for cholangiocarcinoma (Pro). HPB (Oxford) 10 (2): 130-3, 2008.18773090
Laurent A, Tayar C, Cherqui D: Cholangiocarcinoma: preoperative biliary drainage (Con). HPB (Oxford) 10 (2): 126-9, 2008.18773089
Stain SC, Baer HU, Dennison AR, et al.: Current management of hilar cholangiocarcinoma. Surg Gynecol Obstet 175 (6): 579-88, 1992.1280374 93079634
Fong Y, Blumgart LH, Lin E, et al.: Outcome of treatment for distal bile duct cancer. Br J Surg 83 (12): 1712-5, 1996.9038548
Bortolasi L, Burgart LJ, Tsiotos GG, et al.: Adenocarcinoma of the distal bile duct. A clinicopathologic outcome analysis after curative resection. Dig Surg 17 (1): 36-41, 2000.10720830
Murakami Y, Uemura K, Sudo T, et al.: Adjuvant gemcitabine plus S-1 chemotherapy improves survival after aggressive surgical resection for advanced biliary carcinoma. Ann Surg 250 (6): 950-6, 2009.19953713
Bridgewater J, Fletcher P, Palmer DH, et al.: Long-Term Outcomes and Exploratory Analyses of the Randomized Phase III BILCAP Study. J Clin Oncol 40 (18): 2048-2057, 2022.35316080
Yoo C, Jeong H, Kim K, et al.: Adjuvant gemcitabine plus cisplatin (GemCis) versus capecitabine (CAP) in patients (pts) with resected lymph node (LN)-positive extrahepatic cholangiocarcinoma (CCA): A multicenter, open-label, randomized, phase 2 study (STAMP). [Abstract] J Clin Oncol 40 (Suppl 16): A-4019, 2022.
Edeline J, Benabdelghani M, Bertaut A, et al.: Gemcitabine and Oxaliplatin Chemotherapy or Surveillance in Resected Biliary Tract Cancer (PRODIGE 12-ACCORD 18-UNICANCER GI): A Randomized Phase III Study. J Clin Oncol 37 (8): 658-667, 2019.30707660
Ebata T, Hirano S, Konishi M, et al.: Randomized clinical trial of adjuvant gemcitabine chemotherapy versus observation in resected bile duct cancer. Br J Surg 105 (3): 192-202, 2018.29405274
Neoptolemos JP, Moore MJ, Cox TF, et al.: Effect of adjuvant chemotherapy with fluorouracil plus folinic acid or gemcitabine vs observation on survival in patients with resected periampullary adenocarcinoma: the ESPAC-3 periampullary cancer randomized trial. JAMA 308 (2): 147-56, 2012.22782416
Takada T, Amano H, Yasuda H, et al.: Is postoperative adjuvant chemotherapy useful for gallbladder carcinoma? A phase III multicenter prospective randomized controlled trial in patients with resected pancreaticobiliary carcinoma. Cancer 95 (8): 1685-95, 2002.12365016
Kim TH, Han SS, Park SJ, et al.: Role of adjuvant chemoradiotherapy for resected extrahepatic biliary tract cancer. Int J Radiat Oncol Biol Phys 81 (5): e853-9, 2011.21497455
Hughes MA, Frassica DA, Yeo CJ, et al.: Adjuvant concurrent chemoradiation for adenocarcinoma of the distal common bile duct. Int J Radiat Oncol Biol Phys 68 (1): 178-82, 2007.17276614
Klinkenbijl JH, Jeekel J, Sahmoud T, et al.: Adjuvant radiotherapy and 5-fluorouracil after curative resection of cancer of the pancreas and periampullary region: phase III trial of the EORTC gastrointestinal tract cancer cooperative group. Ann Surg 230 (6): 776-82; discussion 782-4, 1999.10615932 20081678
Ben-Josef E, Guthrie KA, El-Khoueiry AB, et al.: SWOG S0809: A Phase II Intergroup Trial of Adjuvant Capecitabine and Gemcitabine Followed by Radiotherapy and Concurrent Capecitabine in Extrahepatic Cholangiocarcinoma and Gallbladder Carcinoma. J Clin Oncol 33 (24): 2617-22, 2015.25964250

## Treatment of Unresectable (Including Metastatic and Recurrent) Bile Duct Cancer

### Treatment Options for Unresectable (Including Metastatic and Recurrent) Bile Duct Cancer

Treatment options for unresectable (including metastatic and recurrent) bile duct cancer include:

1. Palliative therapy.
2. Chemotherapy.
3. Immunotherapy.
4. Targeted therapy.

#### Palliative therapy

Relief of biliary obstruction is warranted when symptoms such as pruritus and hepatic dysfunction outweigh other symptoms of the cancer. When possible, such palliation can be achieved with the placement of bile duct stents by operative, endoscopic, or percutaneous techniques.[1,2]

Palliative radiation therapy may be beneficial, and patients may be candidates for stereotactic body radiation therapy [3] and intra-arterial embolization.[4]

#### Chemotherapy

Systemic chemotherapy is appropriate for selected patients with adequate performance status and intact organ function.

Evidence (chemotherapy):

1. The phase III ABC-02 (https://www.cancer.gov/clinicaltrials/NCT00262769) study (NCT00262769) randomly assigned 410 patients with unresectable, recurrent, or metastatic biliary tract carcinoma to receive either cisplatin plus gemcitabine or gemcitabine alone for up to 6 months.[5][Level of evidence A1]
  - The median overall survival (OS) was prolonged in the cisplatin-gemcitabine group (11.7 months) compared with the gemcitabine-alone group (8.1 months) (hazard ratio [HR], 0.64; 95% confidence interval [CI], 0.52−0.80; P < .001).[5]
  - A similar median OS benefit was demonstrated in all subgroups, including 73 patients with extrahepatic bile duct cancer and 57 patients with hilar tumors.
  - Grades 3 and 4 toxicities occurred with similar frequencies in both study groups, with the exception of increased hematologic toxicity in the cisplatin-gemcitabine group and increased hepatic toxicity in the gemcitabine-alone group.
2. A phase II study (NCT03044587 (https://www.cancer.gov/clinicaltrials/NCT03044587)) included 91 patients with advanced cholangiocarcinoma. Patients were randomly assigned to receive the combination of liposomal irinotecan, 5-fluorouracil (5-FU), and leucovorin (arm A) or the ABC-02 study regimen of cisplatin plus gemcitabine (arm B). The primary end point was a prespecified benchmark of a 4-month progression-free survival (PFS) rate of 40%.[6][Level of evidence B3]
  - The 4-month PFS rate was 51% in arm A. The median PFS was 6 months (95% CI, 2.4–9.6) in arm A and 6.9 months (95% CI, 2.5–7.9) in arm B.
  - The median OS was 15.9 months (95% CI, 10.6–20.3) in arm A and 13.6 months (95% CI, 6.5–17.7) in arm B.
3. A phase III noninferiority study (NCT01470443 (https://www.cancer.gov/clinicaltrials/NCT01470443)) enrolled 114 patients with metastatic biliary tract cancers, including 30 (26%) with primary gallbladder cancer. Patients were randomly assigned to receive capecitabine plus oxaliplatin (XELOX) or gemcitabine plus oxaliplatin (GEMOX). The primary end point was 6-month PFS.[7][Level of evidence B1]
  - OS was not significantly different between treatment groups. It was 10.4 months (95% CI, 8.0−12.6) in the GEMOX group and 10.6 months (95% CI, 7.3−15.5) in the XELOX group (P = .131).
  - The PFS rate was 44.6% in the GEMOX group and 46.7% in the XELOX group (95% CI of difference in 6-month PFS rate, -12% to 16%, meeting criteria for noninferiority).
  - A predefined subgroup analysis based on primary site of disease did not reveal a difference in objective response rate between the two arms in patients with gallbladder cancer (P = .598).

Pending further clinical trials, cisplatin plus gemcitabine is considered the reference standard first-line chemotherapy backbone for patients with unresectable, metastatic, or recurrent bile duct cancer. Following the results of the TOPAZ-1 and KEYNOTE-966 trials, addition of a checkpoint inhibitor (either durvalumab or pembrolizumab) to front-line therapy has become the standard of care (for more information, see the Immunotherapy section). Potential alternatives include 5-FU plus liposomal irinotecan, gemcitabine plus capecitabine, GEMOX, and XELOX. All patients should consider clinical trials.

There is limited high-quality evidence to guide selection of a second-line regimen in refractory disease:

1. A multicenter phase III trial in the United Kingdom (ABC-06 (https://www.cancer.gov/clinicaltrials/NCT01926236) [NCT01926236]) included 162 patients with locally advanced or metastatic biliary tract cancer and documented radiological disease progression on first-line cisplatin and gemcitabine. Patients were randomly assigned to receive either FOLFOX (folinic acid, 5-FU, and oxaliplatin) with active symptom control (ASC) or ASC alone. The following results were observed after a median follow-up of 21.7 months:[8][Level of evidence A1]
  - The median OS was significantly longer in the FOLFOX group (6.2 months) than in the ASC-alone group (5.3 months) (adjusted HR, 0.69; 95% CI, 0.50−0.97; P = .031). In the FOLFOX group, the OS rate was 50.6% at 6 months and 25.9% at 12 months, compared with 35.5% at 6 months and 11.4% at 12 months in the ASC-alone group.
  - Grade 3 to 5 adverse events were reported in 56 patients (69%) in the FOLFOX group, compared with 42 patients (52%) in the ASC-alone group. The most frequently reported grade 3 to 5 FOLFOX-related adverse events were neutropenia (12%), fatigue/lethargy (11%), and infection (10%). There were three chemotherapy-related deaths, one each due to infection, acute kidney injury, and febrile neutropenia.
  Two phase II trials have evaluated 5-FU and leucovorin with or without liposomal irinotecan, but results differed.
2. A multicenter phase IIb trial in South Korea (NIFTY (https://www.cancer.gov/clinicaltrials/NCT03524508) [NCT03524508]) randomly assigned 174 patients with metastatic biliary tract cancer that had progressed during first-line cisplatin and gemcitabine to receive 5-FU and leucovorin with or without liposomal irinotecan. The following was observed after a median follow-up of 6.1 months:[9][Level of evidence A1]
  - The primary end point of median PFS was significantly longer in the group who received liposomal irinotecan (3.9 months) compared with the group who received 5-FU plus leucovorin alone (1.6 months) (HR, 0.38; 95% CI, not reported; P = .0001). A secondary end point of median OS was also significantly longer in the group who received liposomal irinotecan (8.6 months) compared with the group who received 5-FU plus leucovorin alone (5.3 months) (HR, 0.68; 95% CI, not reported; P = .024).
3. The German multicenter phase II NALIRICC (https://www.cancer.gov/clinicaltrials/NCT03043547) trial (NCT03043547) included 100 patients with metastatic biliary tract cancer that progressed during gemcitabine-based therapy. Patients were randomly assigned to receive 5-FU plus leucovorin with or without liposomal irinotecan.[10][Level of evidence A1]
  - The median PFS in the liposomal irinotecan group was 2.6 months, compared with 2.3 months in the 5-FU–leucovorin-alone group (HR, 0.87; 95% CI, 0.56–1.35; P not reported). The median OS was 6.9 months in the liposomal irinotecan group and 8.2 months in the 5-FU–leucovorin-alone group (HR, 1.08; 95% CI, 0.68–1.72; P not reported).
  - Toxicity was significantly higher in the liposomal irinotecan group, with treatment-related serious adverse events occurring in 16 patients (33%), compared with one patient (2%) in the 5-FU–leucovorin-alone group. The most common grade 3 or higher adverse events in the liposomal irinotecan group were neutropenia (17%), diarrhea (15%), and nausea (8%).

#### Immunotherapy

Based on results from the TOPAZ-1 and KEYNOTE-966 trials, all patients with unresectable, metastatic, or recurrent disease should consider treatment with a checkpoint inhibitor (either durvalumab or pembrolizumab) with cisplatin and gemcitabine (the previous standard-of-care doublet) in the first-line setting.[11-13]

Evidence (immunotherapy):

1. An international, multicenter, phase III study (TOPAZ-1 (https://www.cancer.gov/clinicaltrials/NCT03875235) [NCT03875235]) included 685 patients with locally advanced, recurrent, or metastatic biliary tract cancer that was unresectable and previously untreated. Patients were randomly assigned to receive either durvalumab or placebo with cisplatin plus gemcitabine for up to eight cycles, followed by durvalumab or placebo maintenance until disease progression or unacceptable toxicity occurred. The primary end point was OS. After a median follow-up of 23.4 months for patients in the durvalumab arm, the following results were observed:[12,13]
  - The median OS was significantly improved in the durvalumab group (12.9 months) compared with the placebo group (11.3 months) (HR, 0.76; 95% CI, 0.64–0.91). In the durvalumab group, the 18-month OS rate was 35.1% and the 24-month OS rate was 24.9%. In the placebo group, the 18-month OS rate was 25.5% and the 24-month OS rate was 10.4%.[12,13][Level of evidence A1]
  - There was no significant difference between groups in the number of grade 3 or 4 treatment-related adverse events or the number of events leading to discontinuation of a study medication.
2. An international, multicenter, phase III study (KEYNOTE-966 (https://www.cancer.gov/clinicaltrials/NCT04003636) [NCT04003636]) enrolled 1,069 patients with previously untreated, unresectable, locally advanced or metastatic biliary tract cancer. Patients were randomly assigned to receive either pembrolizumab or placebo for up to 35 cycles. This was combined with gemcitabine (with no maximum duration) and cisplatin for up to 8 cycles. After a median follow-up of 25.6 months, the following results were observed:[11][Level of evidence A1]
  - The median OS was 12.7 months in the pembrolizumab group and 10.9 months in the placebo group (HR, 0.83; 95% CI, 0.72–0.95; one-sided P = .0034).
  - There was no difference in the total frequency of treatment-related adverse events between treatment groups, including grade 3 or grade 4 events. Death due to treatment-related adverse events was seen in a total of eight patients (2%) in the pembrolizumab arm and three patients (1%) in the placebo arm.

All patients with unresectable, metastatic, or recurrent disease who have not already received a checkpoint inhibitor should have molecular testing for deficient mismatch repair (dMMR) or microsatellite instability-high (MSI-H) tumors. Extrapolating from a subgroup of patients with gastrointestinal and hepatopancreatobiliary tumors in the I-PREDICT (https://www.cancer.gov/clinicaltrials/NCT02534675) (NCT02534675) and KEYNOTE-158 (https://www.cancer.gov/clinicaltrials/NCT02628067) (NCT02628067) studies, patients with either dMMR or MSI-H tumors can consider pembrolizumab treatment.[14,15][Level of evidence C3]

#### Targeted therapy

Patients with targetable pathogenic variants can consider clinical trials of investigational therapies. Currently, targeted therapies have only been approved for patients whose disease has progressed or who are ineligible for first-line therapies.

##### IDH1 inhibitors

Up to 15% of bile duct cancers have IDH1 variants.

Evidence (IDH1 inhibitors):

1. The phase III ClarIDHy (https://www.cancer.gov/clinicaltrials/NCT02989857) trial (NCT02989857) included 187 patients with cholangiocarcinoma and IDH1 variants. Patients had disease that had progressed during previous systemic therapy. Patients were randomly assigned to receive either the IDH1 inhibitor ivosidenib or placebo. The primary end point was PFS.[16,17][Level of evidence B1]
  - The median PFS was improved among patients treated with ivosidenib (2.7 months) compared with placebo (1.4 months) (HR, 0.37; 95% CI, 0.25−0.54; P < .001). PFS rates at 6 months and 12 months were 32% and 21.9%, respectively, in the ivosidenib arm. No patients in the placebo group were progression free at 6 months.
  - In the intention-to-treat analysis, median OS was 10.3 months in the ivosidenib group compared with 7.5 months for the placebo group (HR, 0.79; one-sided P = .09), despite crossover of 57% of placebo patients to ivosidenib. When adjusted for crossover, median OS for the placebo group was 5.1 months.
  - Grades 3 and 4 toxicities occurred in 46% of patients in the ivosidenib group and 36% of patients in the placebo group.

##### FGFR inhibitors

FGFR2 gene fusions are present in approximately 15% of intrahepatic cholangiocarcinomas. Multiple phase II trials, some reported in abstract form, have suggested activity of FGFR inhibitors in patients with cholangiocarcinoma and FGFR2 fusions whose disease progressed after or who were ineligible for first-line chemotherapy.[18,19]

Evidence (FGFR inhibitors):

1. The multicenter, open-label, single-arm phase II FIGHT-202 (https://www.cancer.gov/clinicaltrials/NCT02924376) trial (NCT02924376) enrolled 147 patients with disease progression during or after at least one previous therapy. A total of 108 patients had FGFR2 rearrangements or fusions. All patients received 13.5 mg of pemigatinib orally once daily for 14 consecutive days, followed by 7 days off therapy. At a median follow-up of 45.4 months, the following results were observed:[20][Level of evidence C3]
  - The overall response rate in the cohort of patients with FGFR2 rearrangements/fusions was 37% (95% CI, 27.9%−46.9%), including three complete responses. Among the 40 patients who achieved an objective response, the median duration of response was 9.1 months (95% CI, 6.0–14.5).
  - The median PFS in patients with FGFR2 rearrangements or fusions was 7.0 months (95% CI, 6.1–10.5), and the median OS was 17.5 months (95% CI, 14.4–22.9). Given the single-arm study design, the relative effect of pemigatinib on PFS and OS was not established. However, in the cohort of study patients whose tumors did not harbor FGFR rearrangements, the median PFS was only 1.5 months and the median OS was only 4.0 months.
  - The most common adverse effect was hyperphosphatemia, occurring in 58.5% of patients, although no adverse effect was grade 3 or higher. Adverse events led to treatment discontinuation in 10.2% of patients, dose reduction in 13.64% of patients, and dose interruptions in 42.2% of patients.
  In 2020, the FDA granted accelerated approval of pemigatinib for the treatment of adults with previously treated unresectable or metastatic cholangiocarcinoma with an FGFR2 fusion or other rearrangement.
2. Futibatinib is an irreversible noncompetitive inhibitor of FGFR1–4. Preclinical in vitro studies showed that futibatinib was less susceptible to on-target resistance variants than pemigatinib. However, there are no head-to-head clinical trial data comparing outcomes for the various FGFR inhibitors. The multinational, open-label, single-group, phase II FOENIX-CCA2 (https://www.cancer.gov/clinicaltrials/NCT02052778) trial (NCT02052778) evaluated futibatinib in patients with previously treated intrahepatic cholangiocarcinoma and FGFR2 fusions or rearrangements. The study enrolled 103 patients with disease progression after at least one previous line of systemic therapy. All patients received futibatinib at a continuous dose of 20 mg once daily.[21][Level of evidence C3]
  - The overall response rate was 42% (95% CI, 31.1%–50.4%), including one complete response. Of the patients who had a response, the median duration of response was 9.7 months.
  - The median PFS was 9 months (95% CI, 6.9–13.1), and the median OS was 21.7 months (95% CI 14.5–NR). Given the single-arm study design, the relative effect of futibatinib on PFS and OS has not yet been established.
  - The most common adverse effect of any grade was hyperphosphatemia, which occurred in 85% of patients and was grade 3 in 30% of patients. Other common adverse effects included alopecia (33%), dry mouth (30%), dry skin (27%), and fatigue (25%). Other notable grade 3 toxicities included aspartate aminotransferase elevation (7%) and stomatitis (6%). Treatment-related adverse events led to dose interruptions in 50% of patients, dose reductions in 54% of patients, and permanent drug discontinuation in 2% of patients.

Patients with FGFR2 fusion−positive disease should be encouraged to enroll in a clinical trial.

##### HER2-targeted therapy

1. The international, multicenter, single-arm, phase IIb HERIZON-BTC-01 (https://www.cancer.gov/clinicaltrials/NCT04466891) trial (NCT04466891) enrolled 87 patients with HER2-amplified (by fluorescence in situ hybridization), unresectable, locally advanced or metastatic biliary tract cancer whose disease progressed on prior gemcitabine-based therapy. Cohort 1 included 80 patients with HER2 2+ or 3+ expression by immunohistochemistry (IHC), while cohort 2 included seven patients with HER2 0+ or 1+ expression by IHC. All patients received zanidatamab, a bispecific antibody targeting two distinct HER2 epitopes, at a dose of 20 mg/kg intravenously every 2 weeks. At a median follow-up of 12.4 months, the following results were observed:[22][Level of evidence C3]
  - In cohort 1, the objective response rate was 41.3% (95% CI, 30.4%–52.8%). The median duration of response was 12.9 months (95% CI, 6.0–not reached).
  - The median PFS was 5.5 months in cohort 1 (95% CI, 3.7–7.2) and 1.9 months (95% CI, 1.2–not estimable) in cohort 2.
  - Serious treatment-related adverse events occurred in 8% of patients. Zanidatamab was discontinued in two patients: one due to reduced ejection fraction and one due to pneumonitis. Diarrhea (37%) and infusion reactions with the first cycle (33%) were relatively common, but mostly low-grade.
  - The FDA has granted breakthrough therapy designation for zanidatamab in this setting, but it is not yet FDA approved.

Although not FDA approved specifically for biliary tract cancer, a growing body of evidence demonstrated activity of the antibody-drug conjugate trastuzumab deruxtecan in patients with HER2-expressing solid tumors.

1. The DESTINY-PanTumor02 (https://www.cancer.gov/clinicaltrials/NCT04482309) trial (NCT04482309), reported in abstract form, was tumor-agnostic (enrolled patients with HER2-positive tumors from any site) but included a subset of 41 patients with biliary tract cancer.[23][Level of evidence C3]
  - The overall response rate was 22% in this subset of patients.
2. The phase II HERB (https://www.cancer.gov/clinicaltrials/NCT04482309) trial (NCT04482309) enrolled 32 patients (24 with HER2-positive disease, 8 with HER2-low disease) with biliary tract cancers refractory to, or intolerant of, a gemcitabine-containing regimen. All patients received trastuzumab deruxtecan.[24][Level of evidence C3]
  - Among the patients with HER2-positive disease, the overall response rate was 36.4%. The median PFS was 5.1 months (95% CI, 3.0–7.3), and the median OS was 7.1 months (95% CI, 4.7–14.6).
  - Among the small sample of eight patients with HER2-low disease, the overall response rate was 12.5%. The median PFS was 3.5 months (95% CI, 1.2–5.5), and the median OS was 8.9 months (95% CI, 3.0–12.8).

Similarly, the combination of tucatinib and trastuzumab—which the FDA has not approved for the treatment of biliary tract cancer but has approved for breast and colorectal cancer indications—was shown to have potential activity in previously treated patients.

1. The tumor-agnostic phase II SGNTUC-019 (https://www.cancer.gov/clinicaltrials/NCT04579380) study (NCT04579380) evaluated the combination of tucatinib and trastuzumab. The trial included a cohort of 30 patients with previously treated HER2-overexpressing or HER2-amplified biliary tract cancer.[25][Level of evidence C3]
  - At a median follow-up of 10.8 months, the objective response rate was 46.7% (90% CI, 30.8%–63.0%), with a disease control rate of 76.7% (90% CI, 60.6%–88.5%).
  - The median PFS was 5.5 months (90% CI, 3.9–8.2).
  - The most common treatment-related adverse events were pyrexia (43.3%) and diarrhea (40%). Adverse events caused no deaths but led one patient to discontinue treatment.

Patients with HER2-amplified disease are candidates for clinical trials.

All patients are encouraged to enroll in clinical trials for adjuvant therapies. Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Nordback IH, Pitt HA, Coleman J, et al.: Unresectable hilar cholangiocarcinoma: percutaneous versus operative palliation. Surgery 115 (5): 597-603, 1994.7513906 94233494
Levy MJ, Baron TH, Gostout CJ, et al.: Palliation of malignant extrahepatic biliary obstruction with plastic versus expandable metal stents: An evidence-based approach. Clin Gastroenterol Hepatol 2 (4): 273-85, 2004.15067620
Barney BM, Olivier KR, Miller RC, et al.: Clinical outcomes and toxicity using stereotactic body radiotherapy (SBRT) for advanced cholangiocarcinoma. Radiat Oncol 7: 67, 2012.22553982
Hyder O, Marsh JW, Salem R, et al.: Intra-arterial therapy for advanced intrahepatic cholangiocarcinoma: a multi-institutional analysis. Ann Surg Oncol 20 (12): 3779-86, 2013.23846786
Valle J, Wasan H, Palmer DH, et al.: Cisplatin plus gemcitabine versus gemcitabine for biliary tract cancer. N Engl J Med 362 (14): 1273-81, 2010.20375404
Ettrich TJ, Modest DP, Sinn M, et al.: Nanoliposomal Irinotecan With Fluorouracil and Leucovorin or Gemcitabine Plus Cisplatin in Advanced Cholangiocarcinoma: A Phase II Study of the AIO Hepatobiliary-YMO Cancer Groups (NIFE-AIO-YMO HEP-0315). J Clin Oncol 42 (26): 3094-3104, 2024.38843469
Kim ST, Kang JH, Lee J, et al.: Capecitabine plus oxaliplatin versus gemcitabine plus oxaliplatin as first-line therapy for advanced biliary tract cancers: a multicenter, open-label, randomized, phase III, noninferiority trial. Ann Oncol 30 (5): 788-795, 2019.30785198
Lamarca A, Palmer DH, Wasan HS, et al.: Second-line FOLFOX chemotherapy versus active symptom control for advanced biliary tract cancer (ABC-06): a phase 3, open-label, randomised, controlled trial. Lancet Oncol 22 (5): 690-701, 2021.33798493
Yoo C, Kim KP, Kim I, et al.: Final results from the NIFTY trial, a phase IIb, randomized, open-label study of liposomal Irinotecan (nal-IRI) plus fluorouracil (5-FU)/leucovorin (LV) in patients (pts) with previously treated metastatic biliary tract cancer (BTC). Ann Oncol 33 (Suppl 7): S565, 2022.
Vogel A, Saborowski A, Wenzel P, et al.: Nanoliposomal irinotecan and fluorouracil plus leucovorin versus fluorouracil plus leucovorin in patients with cholangiocarcinoma and gallbladder carcinoma previously treated with gemcitabine-based therapies (AIO NALIRICC): a multicentre, open-label, randomised, phase 2 trial. Lancet Gastroenterol Hepatol 9 (8): 734-744, 2024.38870977
Kelley RK, Ueno M, Yoo C, et al.: Pembrolizumab in combination with gemcitabine and cisplatin compared with gemcitabine and cisplatin alone for patients with advanced biliary tract cancer (KEYNOTE-966): a randomised, double-blind, placebo-controlled, phase 3 trial. Lancet 401 (10391): 1853-1865, 2023.37075781
Oh DY, He AR, Qin S, et al.: Updated overall survival (OS) from the phase III TOPAZ-1 study of durvalumab (D) or placebo (PBO) plus gemcitabine and cisplatin (+ GC) in patients (pts) with advanced biliary tract cancer (BTC). Ann Oncol 33 (Suppl 7): S565-S566, 2022.
Oh DY, He AR, Bouattour M, et al.: Durvalumab or placebo plus gemcitabine and cisplatin in participants with advanced biliary tract cancer (TOPAZ-1): updated overall survival from a randomised phase 3 study. Lancet Gastroenterol Hepatol 9 (8): 694-704, 2024.38823398
Sicklick JK, Kato S, Okamura R, et al.: Molecular profiling of cancer patients enables personalized combination therapy: the I-PREDICT study. Nat Med 25 (5): 744-750, 2019.31011206
Marabelle A, Le DT, Ascierto PA, et al.: Efficacy of Pembrolizumab in Patients With Noncolorectal High Microsatellite Instability/Mismatch Repair-Deficient Cancer: Results From the Phase II KEYNOTE-158 Study. J Clin Oncol 38 (1): 1-10, 2020.31682550
Abou-Alfa GK, Macarulla T, Javle MM, et al.: Ivosidenib in IDH1-mutant, chemotherapy-refractory cholangiocarcinoma (ClarIDHy): a multicentre, randomised, double-blind, placebo-controlled, phase 3 study. Lancet Oncol 21 (6): 796-807, 2020.32416072
Zhu AX, Macarulla T, Javle MM, et al.: Final Overall Survival Efficacy Results of Ivosidenib for Patients With Advanced Cholangiocarcinoma With IDH1 Mutation: The Phase 3 Randomized Clinical ClarIDHy Trial. JAMA Oncol 7 (11): 1669-1677, 2021.34554208
Mazzaferro V, El-Rayes BF, Droz Dit Busset M, et al.: Derazantinib (ARQ 087) in advanced or inoperable FGFR2 gene fusion-positive intrahepatic cholangiocarcinoma. Br J Cancer 120 (2): 165-171, 2019.30420614
Droz Dit Busset M, Braun S, El-Rayes B, et al.: Efficacy of derazantinib (DZB) in patients (pts) with intrahepatic cholangiocarcinoma (ICCA) expressing FGFR2-fusion or FGFR2 mutations/amplifications. [Abstract] Ann Oncol 30 (Suppl 5): A-721P, 2019.
Vogel A, Sahai V, Hollebecque A, et al.: An open-label study of pemigatinib in cholangiocarcinoma: final results from FIGHT-202. ESMO Open 9 (6): 103488, 2024.38838500
Goyal L, Meric-Bernstam F, Hollebecque A, et al.: Futibatinib for FGFR2-Rearranged Intrahepatic Cholangiocarcinoma. N Engl J Med 388 (3): 228-239, 2023.36652354
Harding JJ, Fan J, Oh DY, et al.: Zanidatamab for HER2-amplified, unresectable, locally advanced or metastatic biliary tract cancer (HERIZON-BTC-01): a multicentre, single-arm, phase 2b study. Lancet Oncol 24 (7): 772-782, 2023.37276871
Meric-Bernstam F, Makker V, Oaknin A, et al.: Efficacy and safety of trastuzumab deruxtecan (T-DXd) in patients (pts) with HER2-expressing solid tumors: DESTINY-PanTumor02 (DP-02) interim results. [Abstract] J Clin Oncol 41 (Suppl 17): A-LBA3000, 2023.
Ohba A, Morizane C, Kawamoto Y, et al.: Trastuzumab Deruxtecan in Human Epidermal Growth Factor Receptor 2-Expressing Biliary Tract Cancer (HERB; NCCH1805): A Multicenter, Single-Arm, Phase II Trial. J Clin Oncol 42 (27): 3207-3217, 2024.39102634
Nakamura Y, Mizuno N, Sunakawa Y, et al.: Tucatinib and Trastuzumab for Previously Treated Human Epidermal Growth Factor Receptor 2-Positive Metastatic Biliary Tract Cancer (SGNTUC-019): A Phase II Basket Study. J Clin Oncol 41 (36): 5569-5578, 2023.37751561

## Latest Updates to This Summary (03/28/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Treatment of Unresectable (Including Metastatic and Recurrent) Bile Duct Cancer

Added text about the results of a phase II study that randomly assigned 91 patients with advanced cholangiocarcinoma to receive the combination of liposomal irinotecan, 5-fluorouracil (5-FU), and leucovorin or the ABC-02 study regimen of cisplatin plus gemcitabine (cited Ettrich et al. as reference 6 and level of evidence B3).

Added text to state that two phase II trials have evaluated 5-FU and leucovorin with or without liposomal irinotecan, but results differed. Also added text about a phase II trial that included 100 patients with metastatic biliary tract cancer that progressed during gemcitabine-based therapy. Patients were randomly assigned to receive 5-FU plus leucovorin with or without liposomal irinotecan (cited Vogel [Lancet Gastroenterol Hepatol 2024] et al. as reference 10 and level of evidence A1).

Revised text about the results of a multicenter, open-label, single-arm phase II trial of pemigatinib that included 147 patients with disease progression during or after at least one previous therapy (cited Vogel [ESMO Open 2024] et al. as reference 20).

Revised text about the results of a phase II trial of trastuzumab deruxtecan in 32 patients with biliary tract cancers refractory to, or intolerant of, a gemcitabine-containing regimen (cited Ohba et al. as reference 24).

This summary is written and maintained by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of bile duct cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Bile Duct Cancer (Cholangiocarcinoma) Treatment are:

- Amit Chowdhry, MD, PhD (University of Rochester Medical Center)
- Leon Pappas, MD, PhD (Massachusetts General Hospital )
- Ari Seifter, MD (Advocate Health Care)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Adult Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Bile Duct Cancer (Cholangiocarcinoma) Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/liver/hp/bile-duct-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389308]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).